# Childhood Pleuropulmonary Blastoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood pleuropulmonary blastoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Types of Pleuropulmonary Blastoma

Pleuropulmonary blastoma is a rare and highly aggressive pulmonary malignancy that can present as a pulmonary or pleural mass. In most cases, pleuropulmonary blastoma is associated with germline pathogenic variants of the DICER1 gene. The International Pleuropulmonary Blastoma/DICER1 Registry (https://www.ppbregistry.org/) is a valuable resource for information about this rare malignancy.[1,2]

The following subtypes of pleuropulmonary blastoma have been identified:

### Type I

Type I pleuropulmonary blastoma is a purely lung cystic neoplasm with subtle malignant changes that typically occurs in the first 2 years of life. Patients have a good prognosis. The median age at diagnosis for Type I tumors is 7 months,[3] and there is a slight male predominance. Transition from Type I to Type III occurs. However, a significant proportion of Type I lesions may not progress to Type II and Type III tumors.[2,4]

Histologically, these tumors appear as a multilocular cyst with variable numbers of primitive mesenchymal cells beneath a benign epithelial surface. Skeletal differentiation occurs in one-half of the cases.[4] This form of disease can be clinically and pathologically deceptive because of its resemblance to some developmental lung cysts, with over 10% discordance between local and central pathology review.[3]

### Type Ir

Type Ir was originally recognized in older siblings of patients with pleuropulmonary blastoma but can also be seen in very young children. A lung cyst in an older individual with a DICER1 variant or in a relative of a patient with pleuropulmonary blastoma is most likely to be Type Ir.[2] This is a purely cystic tumor that lacks a primitive cell component. The r designation signifies regression or nonprogression. In the National Cancer Institute Natural History of DICER1 Syndrome study and the International Pleuropulmonary Blastoma/DICER1 Registry, people with germline DICER1 pathogenic or likely pathogenic variants who did not have computed tomography (CT) scans before age 12 years were screened with chest CT. Cystic lesions were identified in 38% of individuals (42 of 110). Five cysts were resected, four of which were classified as Type Ir. The other cysts were not biopsied to confirm the Type Ir diagnosis.[5]

In the International Pleuropulmonary Blastoma Registry, most Type I and Type Ir cysts are unilateral (74%), one-half are unifocal, and 55% are larger than 5 cm. Pneumothorax may be present at diagnosis in up to 30% of Type I and Type Ir pleuropulmonary blastoma cases.[2]

### Type II

In the International Pleuropulmonary Blastoma Registry, the median age at diagnosis is 35 months, and distant metastases are present at the time of diagnosis in 7% of patients.[2]

Type II exhibits both cystic and solid components. The solid areas have mixed blastomatous and sarcomatous features. Most of the cases exhibit rhabdomyoblasts, and nodules with cartilaginous differentiation are common.[6] Anaplasia is present in up to 60% of the cases.[7]

### Type III

In the International Pleuropulmonary Blastoma Registry, the median age at diagnosis is 41 months, and distant metastases are present at the time of diagnosis in 10% of patients.[2]

Type III is a purely solid neoplasm, with the blastomatous and sarcomatous elements described for Type II. Anaplasia is present in 70% of patients.[7-9]

In one report, 15 of 16 pleuropulmonary blastoma tumors were positive for IGF1R expression by immunohistochemistry.[10] Genomic profiling showed amplification of the IGF1R gene in 4 of 16 pleuropulmonary blastoma tumors. All of these gene-amplified tumors were Type III.

The International Pleuropulmonary Blastoma Registry reported on 350 centrally reviewed and confirmed cases of pleuropulmonary blastoma over a 50-year period (see Table 1).[2]

Table 1. Relative Proportions and Features of Pleuropulmonary Blastoma^a^

| Type I | Type Ir | Type II | Type II/III or III
Relative proportion of pleuropulmonary blastoma cases | 33% | | 35% | 32%
Presence of germline DICER1 pathogenic variant | 75% | 83% | 63% | 75%
Median age at diagnosis (months) | 7 | 31 | 35 | 41
5-year overall survival rate | 98% | 100% | 71% | 53%

^a^Adapted from Messinger et al.[2] and Nelson et al.[3]

### References

The International Pleuropulmonary Blastoma/DICER1 Registry. Minneapolis, Minn: Children's Minnesota. Available online (https://www.ppbregistry.org/). Last accessed August 23, 2024.
Messinger YH, Stewart DR, Priest JR, et al.: Pleuropulmonary blastoma: a report on 350 central pathology-confirmed pleuropulmonary blastoma cases by the International Pleuropulmonary Blastoma Registry. Cancer 121 (2): 276-85, 2015.25209242
Nelson AT, Harris AK, Watson D, et al.: Type I and Ir pleuropulmonary blastoma (PPB): A report from the International PPB/DICER1 Registry. Cancer 129 (4): 600-613, 2023.36541021
Hill DA, Jarzembowski JA, Priest JR, et al.: Type I pleuropulmonary blastoma: pathology and biology study of 51 cases from the international pleuropulmonary blastoma registry. Am J Surg Pathol 32 (2): 282-95, 2008.18223332
Nelson AT, Vasta LM, Watson D, et al.: Prevalence of lung cysts in adolescents and adults with a germline DICER1 pathogenic/likely pathogenic variant: a report from the National Institutes of Health and International Pleuropulmonary Blastoma/DICER1 Registry. Thorax 79 (7): 644-651, 2024.38508719
Priest JR, McDermott MB, Bhatia S, et al.: Pleuropulmonary blastoma: a clinicopathologic study of 50 cases. Cancer 80 (1): 147-61, 1997.9210721 97354427
Dehner LP, Messinger YH, Schultz KA, et al.: Pleuropulmonary Blastoma: Evolution of an Entity as an Entry into a Familial Tumor Predisposition Syndrome. Pediatr Dev Pathol 18 (6): 504-11, 2015 Nov-Dec.26698637
Priest JR, Hill DA, Williams GM, et al.: Type I pleuropulmonary blastoma: a report from the International Pleuropulmonary Blastoma Registry. J Clin Oncol 24 (27): 4492-8, 2006.16983119
Miniati DN, Chintagumpala M, Langston C, et al.: Prenatal presentation and outcome of children with pleuropulmonary blastoma. J Pediatr Surg 41 (1): 66-71, 2006.16410110
Vokuhl C, de Leon-Escapini L, Leuschner I: Strong Expression and Amplification of IGF1R in Pleuropulmonary Blastomas. Pediatr Dev Pathol 20 (6): 475-481, 2017 Nov-Dec.28382840

## Risk Factors and Surveillance

### Germline DICER1 Pathogenic Variants

Close to two-thirds of patients with pleuropulmonary blastoma have a germline DICER1 pathogenic variant. Approximately one-third of families of children with pleuropulmonary blastoma manifest a number of dysplastic and/or neoplastic conditions comprising the DICER1 syndrome.[1-3]

Germline DICER1 pathogenic variants have been associated with the following:[1-5]

- Cystic nephroma and Wilms tumor. Up to 10% of patients with pleuropulmonary blastoma may develop cystic nephroma or Wilms tumor, which are the most relevant associated malignancies. These tumors are also more prevalent among family members.[6]
- Ovarian sex cord–stromal tumors (especially Sertoli-Leydig cell tumor).
- Multinodular goiter and thyroid carcinoma.[7]
- Uterine cervix embryonal rhabdomyosarcoma.
- Nasal chondromesenchymal hamartoma.
- Renal sarcoma.
- Pulmonary sequestration.
- Juvenile intestinal polyps.
- Ciliary body medulloepithelioma.
- Medulloblastoma.
- Pineoblastoma.
- Pituitary blastoma.
- Seminoma.

The penetrance of DICER1 germline pathogenic variants associated with each pathological condition is not well understood, but lung cysts, pleuropulmonary blastoma, and thyroid nodules are the most commonly reported manifestations in individuals who have loss-of-function variants.[5] Most associated conditions occur in children younger than 10 years, although ovarian tumors and multinodular goiters are described in children and adults aged up to 30 years.[3,5] A study of 102 individuals with DICER1 germline pathogenic variants revealed a neoplasm risk of 5% by the age of 10 years and 19% by the age of 50 years.[8] Surveillance and screening recommendations have been proposed.[5]

### Surveillance

As with other cancer predisposition conditions, before individuals with DICER1 pathogenic variants are screened, factors that must be considered include typical age of onset of each disease, potential benefits of early detection, and risks and availability of screening modalities. A consensus panel convened by the International Pleuropulmonary Blastoma Registry has proposed guidelines for surveillance. In addition to imaging-based surveillance, individuals and families can be counseled at each visit regarding potential signs and symptoms of DICER1-associated conditions and undergo appropriate age- and sex-specific preventive screening studies (see Table 2).[5]

Table 2. Potential Signs and Symptoms and Suggested Imaging Surveillance by System for Individuals With Germline DICER1 Pathogenic Variants^a^

System | Associated Condition | Signs/Symptoms to Consider | Screening: Clinical and Radiographic
Central nervous system and head and neck (excluding thyroid) | Macrocephaly | Pineoblastoma: Headache, emesis, diplopia, decreased ability for upward gaze, altered gait | Physical examination
Central nervous system and head and neck (excluding thyroid) | Pineoblastoma | Precocious puberty | Annual routine dilated ophthalmologic examination (generally unsedated) with visual acuity screening from age 3 years through at least age 10 years
Central nervous system and head and neck (excluding thyroid) | Pituitary blastoma | Pituitary blastoma: Cushing syndrome | Further testing if clinically indicated
Central nervous system and head and neck (excluding thyroid) | CBME | CBME: Decreased visual acuity and leukocoria | Recommend urgent MRI for any symptoms of intracranial pathology
Central nervous system and head and neck (excluding thyroid) | NCMH | NCMH: Nasal obstruction | Recommend urgent MRI for any symptoms of intracranial pathology
Thyroid | Multinodular goiter | Visible or palpable thyroid nodule(s) | Baseline thyroid US by age 8 years, then every 3 years or with symptoms/findings on physical examination
Thyroid | Multinodular goiter | Persistent cervical lymphadenopathy | Baseline thyroid US by age 8 years, then every 3 years or with symptoms/findings on physical examination
Thyroid | Differentiated thyroid cancer | Hoarseness | With anticipated chemotherapy or radiation therapy: Baseline US and then annually for 5 years, decreasing to every 2–3 years if no nodules are detected
Thyroid | Differentiated thyroid cancer | Dysphagia | With anticipated chemotherapy or radiation therapy: Baseline US and then annually for 5 years, decreasing to every 2–3 years if no nodules are detected
Thyroid | Differentiated thyroid cancer | Neck pain | With anticipated chemotherapy or radiation therapy: Baseline US and then annually for 5 years, decreasing to every 2–3 years if no nodules are detected
Thyroid | Differentiated thyroid cancer | Cough | With anticipated chemotherapy or radiation therapy: Baseline US and then annually for 5 years, decreasing to every 2–3 years if no nodules are detected
Lung | PPB | Tachypnea | CXR at birth and every 4–6 months until age 8 years, every 12 months at age 8–12 years; consider a chest CT at age 3–6 months^b^
Lung | Lung cysts | Cough | Toddlers, if initial CT normal: Repeat between age 2.5 and 3 years^b^
Lung | Pulmonary blastoma | Fever | If variant detected at age >12 years, consider baseline CXR or chest CT
Lung | Pulmonary blastoma | Pain | If variant detected at age >12 years, consider baseline CXR or chest CT
Lung | Pulmonary blastoma | Pneumothorax | If variant detected at age >12 years, consider baseline CXR or chest CT
Gastrointestinal | Small intestine polyps | Signs of intestinal obstruction | Education regarding symptoms recommended
Renal | Wilms tumor | Abdominal or flank mass and/or pain | Abdominal US every 6 months until age 8 years, then every 12 months until age 12 years
Renal | Renal sarcoma | Abdominal or flank mass and/or pain | Abdominal US every 6 months until age 8 years, then every 12 months until age 12 years
Renal | Cystic nephroma | Hematuria | If variant detected at age >12 years, consider baseline abdominal US
Female reproductive tract | SLCT | Hirsutism | For females beginning at age 8–10 years: Pelvic and abdominal US every 6–12 months at least until age 40 years
Female reproductive tract | Gynandroblastoma | Virilization | End of interval is undetermined, but current oldest patient with DICER1-associated SLCT was aged 61 years
Female reproductive tract | Cervical ERMS | Abdominal distension, pain, or mass | Education regarding symptoms strongly recommended

CBME = ciliary body medulloepithelioma; CT = computed tomography; CXR = chest x-ray; ERMS = embryonal rhabdomyosarcoma; MRI = magnetic resonance imaging; NCMH = nasal chondromesenchymal hamartoma; PPB = pleuropulmonary blastoma; SLCT = Sertoli-Leydig cell tumor; US = ultrasonography.

^a^Adapted from Schultz et al.[5]

^b^When CT is performed, techniques to minimize radiation exposure should be used. As novel MRI techniques are developed that will eventually allow detection of small cystic lesions, transition to nonradiation containing cross-sectional imaging should be considered.

### References

Hill DA, Ivanovich J, Priest JR, et al.: DICER1 mutations in familial pleuropulmonary blastoma. Science 325 (5943): 965, 2009.19556464
Slade I, Bacchelli C, Davies H, et al.: DICER1 syndrome: clarifying the diagnosis, clinical features and management implications of a pleiotropic tumour predisposition syndrome. J Med Genet 48 (4): 273-8, 2011.21266384
Foulkes WD, Bahubeshi A, Hamel N, et al.: Extending the phenotypes associated with DICER1 mutations. Hum Mutat 32 (12): 1381-4, 2011.21882293
Schultz KA, Pacheco MC, Yang J, et al.: Ovarian sex cord-stromal tumors, pleuropulmonary blastoma and DICER1 mutations: a report from the International Pleuropulmonary Blastoma Registry. Gynecol Oncol 122 (2): 246-50, 2011.21501861
Schultz KAP, Williams GM, Kamihara J, et al.: DICER1 and Associated Conditions: Identification of At-risk Individuals and Recommended Surveillance Strategies. Clin Cancer Res 24 (10): 2251-2261, 2018.29343557
Boman F, Hill DA, Williams GM, et al.: Familial association of pleuropulmonary blastoma with cystic nephroma and other renal tumors: a report from the International Pleuropulmonary Blastoma Registry. J Pediatr 149 (6): 850-854, 2006.17137906
Chernock RD, Rivera B, Borrelli N, et al.: Poorly differentiated thyroid carcinoma of childhood and adolescence: a distinct entity characterized by DICER1 mutations. Mod Pathol 33 (7): 1264-1274, 2020.31937902
Stewart DR, Best AF, Williams GM, et al.: Neoplasm Risk Among Individuals With a Pathogenic Germline Variant in DICER1. J Clin Oncol 37 (8): 668-676, 2019.30715996

## Clinical Presentation and Diagnostic Evaluation

Presenting symptoms for children with pleuropulmonary blastoma are not specific. They commonly include the following:

- Respiratory distress.
- Fever.
- Chest pain.

The tumor is usually located in the lung periphery, but it may be extrapulmonary with involvement of the heart/great vessels, mediastinum, diaphragm, and/or pleura.[1,2] Tumor embolism is a known risk, and radiographic evaluation of the central circulation is performed to identify potentially fatal embolic complications.[3]

Imaging evaluation may include chest radiography, computed tomography, magnetic resonance imaging, and echocardiography. Primary, recurrent, and/or extracranial metastatic pleuropulmonary blastoma presents with an fluorine F 18-fludeoxyglucose–avid lesion on positron emission tomography imaging.[4]

### References

Indolfi P, Bisogno G, Casale F, et al.: Prognostic factors in pleuro-pulmonary blastoma. Pediatr Blood Cancer 48 (3): 318-23, 2007.16619221
Bisogno G, Brennan B, Orbach D, et al.: Treatment and prognostic factors in pleuropulmonary blastoma: an EXPeRT report. Eur J Cancer 50 (1): 178-84, 2014.24041875
Priest JR, Andic D, Arbuckle S, et al.: Great vessel/cardiac extension and tumor embolism in pleuropulmonary blastoma: a report from the International Pleuropulmonary Blastoma Registry. Pediatr Blood Cancer 56 (4): 604-9, 2011.21298746
Hagedorn KN, Nelson AT, Towbin AJ, et al.: Assessing the role of positron emission tomography and bone scintigraphy in imaging of pleuropulmonary blastoma (PPB): A report from the International PPB/DICER1 Registry. Pediatr Blood Cancer 70 (11): e30628, 2023.37592371

## Prognostic Factors

In a comprehensive analysis of 350 patients reported by the International Pleuropulmonary Blastoma Registry, only two prognostic factors were identified: the type of pleuropulmonary blastoma and the presence of metastatic disease at diagnosis.[1] In three additional small cohort series, the ability to perform a complete surgical resection was also identified as a prognostic factor.[2-4]

The presence of a germline DICER1 pathogenic variant is not a prognostic factor.[1]

A retrospective study analyzed TP53 expression by immunohistochemistry (IHC) in patients with pleuropulmonary blastoma.[5] A total of 143 cases were included in the study, with the following distribution of pleuropulmonary blastoma types: Type I, 23%; Type Ir, 14%; Type II, 32%; and Type III, 31%. TP53 expression was determined by IHC and grouped as follows: 0%, 1% to 25%, 26% to 75%, and 76% to 100%. All Type I pleuropulmonary blastomas showed TP53 expressions of 0% to 25%, compared with Type III pleuropulmonary blastomas, which had higher TP53 expressions (>25%) (P < .0001). High TP53 expression (staining observed in >25% of the tumor cells) was significantly associated with age older than 1 year (P = .0033), neoadjuvant therapy (P = .0009), positive resection margin (P = .0008), and anaplasia (P < .0001). TP53 expression was significantly associated with recurrence-free survival (P < .0001) and overall survival (P = .0350). Higher TP53 expression was associated with a worse prognosis. Comparisons of concordance statistics showed no significant difference in prognostication when using morphological types compared with TP53 expression groups (P = .647).[5]

### References

Messinger YH, Stewart DR, Priest JR, et al.: Pleuropulmonary blastoma: a report on 350 central pathology-confirmed pleuropulmonary blastoma cases by the International Pleuropulmonary Blastoma Registry. Cancer 121 (2): 276-85, 2015.25209242
Indolfi P, Bisogno G, Casale F, et al.: Prognostic factors in pleuro-pulmonary blastoma. Pediatr Blood Cancer 48 (3): 318-23, 2007.16619221
Bisogno G, Brennan B, Orbach D, et al.: Treatment and prognostic factors in pleuropulmonary blastoma: an EXPeRT report. Eur J Cancer 50 (1): 178-84, 2014.24041875
Sparber-Sauer M, Seitz G, Kirsch S, et al.: The impact of local control in the treatment of type II/III pleuropulmonary blastoma. Experience of the Cooperative Weichteilsarkom Studiengruppe (CWS). J Surg Oncol 115 (2): 164-172, 2017.28103635
González IA, Mallinger P, Watson D, et al.: Expression of p53 is significantly associated with recurrence-free survival and overall survival in pleuropulmonary blastoma (PPB): a report from the International Pleuropulmonary Blastoma/DICER1 Registry. Mod Pathol 34 (6): 1104-1115, 2021.33637876

## Treatment of Childhood Pleuropulmonary Blastoma

There are no standard treatment options for childhood pleuropulmonary blastoma. Current treatment regimens for these rare tumors have been informed by consensus opinion. The European Cooperative Study Group for Pediatric Rare Tumors within the PARTNER project (Paediatric Rare Tumours Network–European Registry) published comprehensive recommendations for the diagnosis and treatment of pleuropulmonary blastoma in children and adolescents.[1]

Treatment options for childhood pleuropulmonary blastoma include the following:

1. Surgery.
2. Adjuvant chemotherapy.

A complete surgical resection is required for cure.[2]

Data from the International Pleuropulmonary Blastoma Registry and the European Cooperative Study Group for Pediatric Rare Tumors suggest that adjuvant chemotherapy may reduce the risk of recurrence.[3]; [4][Level of evidence C1] Responses to chemotherapy have been reported with agents similar to those used for the treatment of rhabdomyosarcoma.[3-5]

Some general treatment considerations from the International Pleuropulmonary Blastoma Registry, according to subtype, are discussed below.[3,6]

### Type I and Type Ir

Surgery is the treatment of choice for patients with Type I and Type Ir pleuropulmonary blastoma. In the International Pleuropulmonary Blastoma Registry series, the 5-year disease-free survival (DFS) and overall survival (OS) rates were 90% and 98%, respectively, for Type I, and 96% and 100%, respectively, for Type Ir. Approximately 10% of cases progressed to Type II or Type III after surgery. However, adjuvant chemotherapy has been used in almost 40% of patients with Type I disease, and it may be useful for patients at increased risk of recurrence or progression.[3,4,7]

The International Pleuropulmonary Blastoma/DICER1 Registry reported that between 2006 and 2022, there were 205 children who had centrally reviewed Type I or Type Ir pleuropulmonary blastoma. Of these children, 39% with Type I and 5% with Type Ir received chemotherapy.[7]

- Patient outcomes were favorable, although 11 children (9 with Type I and 2 with Type Ir) experienced progression to Type II or III (n = 8) or regrowth of Type I at the surgical site (n = 3). None of these 11 children received chemotherapy before progression.
- The combination of age and cyst size was more useful than either factor alone in predicting whether a particular lesion was Type I or Type Ir.

### Type II and Type III

For patients with Type II and Type III pleuropulmonary blastoma, a multimodal sarcoma treatment approach is recommended. This approach usually includes rhabdomyosarcoma regimens and either upfront or delayed surgery.[3,4,8] Anthracycline-containing regimens appear to be the most effective.[4]

In the Pleuropulmonary Blastoma Registry series, the 5-year DFS and OS rates were 59% and 71%, respectively, for Type II, and 37% and 53%, respectively, for Type III.[3] In this group of patients, approximately 50% of relapses occurred in the brain.[3]

The International Pleuropulmonary Blastoma/DICER1 Registry reported the outcomes of children with Type II and Type III pleuropulmonary blastoma whose first treatment was ifosfamide, vincristine, dactinomycin, and doxorubicin (IVADo). From 1987 to 2021, 314 children with centrally confirmed Type II and Type III pleuropulmonary blastoma who received upfront chemotherapy were enrolled, 132 of whom (75 with Type II and 57 with Type III) received IVADo chemotherapy.[9]

- Adjusted analyses suggested improved OS for children treated with IVADo, compared with historical controls, with an estimated hazard ratio (HR) of 0.65 (95% confidence interval [CI], 0.39–1.08).
- Compared with localized disease, distant metastasis at diagnosis was associated with worse pleuropulmonary blastoma event-free survival and OS, with HRs of 4.23 (95% CI, 2.42–7.38) and 4.69 (95% CI, 2.50–8.80), respectively.

The role of radiation therapy is not well defined. While the use of radiation did not impact survival in the International Pleuropulmonary Blastoma Registry series, only 20% of patients with Type II and Type III received it.[3]

### References

Bisogno G, Sarnacki S, Stachowicz-Stencel T, et al.: Pleuropulmonary blastoma in children and adolescents: The EXPeRT/PARTNER diagnostic and therapeutic recommendations. Pediatr Blood Cancer 68 (Suppl 4): e29045, 2021.33826235
Indolfi P, Bisogno G, Casale F, et al.: Prognostic factors in pleuro-pulmonary blastoma. Pediatr Blood Cancer 48 (3): 318-23, 2007.16619221
Messinger YH, Stewart DR, Priest JR, et al.: Pleuropulmonary blastoma: a report on 350 central pathology-confirmed pleuropulmonary blastoma cases by the International Pleuropulmonary Blastoma Registry. Cancer 121 (2): 276-85, 2015.25209242
Bisogno G, Brennan B, Orbach D, et al.: Treatment and prognostic factors in pleuropulmonary blastoma: an EXPeRT report. Eur J Cancer 50 (1): 178-84, 2014.24041875
Venkatramani R, Malogolowkin MH, Wang L, et al.: Pleuropulmonary blastoma: a single-institution experience. J Pediatr Hematol Oncol 34 (5): e182-5, 2012.22584785
The International Pleuropulmonary Blastoma/DICER1 Registry. Minneapolis, Minn: Children's Minnesota. Available online (https://www.ppbregistry.org/). Last accessed August 23, 2024.
Nelson AT, Harris AK, Watson D, et al.: Type I and Ir pleuropulmonary blastoma (PPB): A report from the International PPB/DICER1 Registry. Cancer 129 (4): 600-613, 2023.36541021
Sparber-Sauer M, Seitz G, Kirsch S, et al.: The impact of local control in the treatment of type II/III pleuropulmonary blastoma. Experience of the Cooperative Weichteilsarkom Studiengruppe (CWS). J Surg Oncol 115 (2): 164-172, 2017.28103635
Schultz KAP, Harris AK, Nelson AT, et al.: Outcomes for Children With Type II and Type III Pleuropulmonary Blastoma Following Chemotherapy: A Report From the International PPB/DICER1 Registry. J Clin Oncol 41 (4): 778-789, 2023.36137255

## Treatment of Progressive or Recurrent Pleuropulmonary Blastoma

A retrospective review included 35 children with Type II or Type III pleuropulmonary blastoma and progressive or recurrent disease who were registered in national and European databases and trials (2000–2018).[1] Patients had a median age of 3.9 years (range, 0.5–17.8 years).

- The median time to progression was 0.58 years (range, 0.02–1.27 years) from diagnosis despite surgery, chemotherapy (n = 9), and radiation therapy (n = 1). All of these patients died.
- Patients were diagnosed with recurrent disease at a median age of 4.3 years (range, 1.7–15.1 years) and had a median delay to relapse of 1.03 years (range, 0.03–2.95 years).
- Recurrent disease occurred locally (n = 12), in combined sites (locally and metastatic) (n = 1), and in metastatic sites (n = 13), including the central nervous system (n = 11) and unspecified sites (n = 2).
- The 5-year event-free survival rate and overall survival (OS) rates for patients with recurrent disease were both 37% (± 19%; 95% confidence interval).
- Local therapy (surgery and radiation therapy) had a favorable impact on OS (P = .03 and .02, respectively).

### References

Sparber-Sauer M, Tagarelli A, Seitz G, et al.: Children with progressive and relapsed pleuropulmonary blastoma: A European collaborative analysis. Pediatr Blood Cancer 68 (12): e29268, 2021.34486213

## Treatment Options Under Clinical Evaluation for Childhood Pleuropulmonary Blastoma

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people in the United States. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than two cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than two cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers diagnosed in children aged 0 to 14 years and 9.3% of the cancers diagnosed in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

Information about these tumors may also be found in sources relevant to adults with cancer.

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621

## Latest Updates to This Summary (04/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Types of Pleuropulmonary Blastoma

Added text to state that in the National Cancer Institute Natural History of DICER1 Syndrome study and the International Pleuropulmonary Blastoma/DICER1 Registry, people with germline DICER1 pathogenic or likely pathogenic variants who did not have computed tomography (CT) scans before age 12 years were screened with chest CT. Cystic lesions were identified in 38% of individuals. Five cysts were resected, four of which were classified as Type Ir. The other cysts were not biopsied to confirm the Type Ir diagnosis (cited Nelson et al. as reference 5).

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood pleuropulmonary blastoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Pleuropulmonary Blastoma Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Pleuropulmonary Blastoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/lung/hp/child-pleuropulmonary-blastoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 31593396]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).